# Childhood Acute Lymphoblastic Leukemia (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood acute lymphoblastic leukemia. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What is childhood acute lymphoblastic leukemia?

Childhood acute lymphoblastic leukemia (also called ALL or acute lymphocytic leukemia) is a cancer of the blood and bone marrow. This is the most common type of cancer in children. It accounts for about 25% of all childhood cancers in the United States and occurs most often in children aged 1 to 4 years.

Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.

Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.

The bone marrow makes blood stem cells (immature cells) that become mature blood cells over time. A blood stem cell may become a myeloid stem cell or a lymphoid stem cell.

A myeloid stem cell becomes one of three types of blood cells:

- red blood cells that carry oxygen and other substances to all the tissues in the body
- granulocytes and other types of white blood cells that help the body's immune system respond to infection, allergens, and inflammation
- platelets that help stop bleeding by forming clots

A lymphoid stem cell becomes a lymphoblast cell and then one of three types of lymphocytes (white blood cells):

- B lymphocytes, which make antibodies to help fight infection
- T lymphocytes, which help B lymphocytes make the antibodies that help fight infection
- natural killer cells, which attack cancer cells and viruses

Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.

Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. A myeloid stem cell becomes a red blood cell, a platelet, or a myeloblast, which then becomes a granulocyte (the types of granulocytes are eosinophils, basophils, and neutrophils). A lymphoid stem cell becomes a lymphoblast and then becomes a B-lymphocyte, T-lymphocyte, or natural killer cell.

ALL occurs because too many stem cells become lymphoblasts that do not mature into B lymphocytes or T lymphocytes. These cells are also called leukemia cells. Leukemia cells are not able to fight infection very well. Also, as the number of leukemia cells increases in the blood and bone marrow, there is less room for healthy red blood cells, platelets, and white blood cells. This may lead to anemia, easy bleeding, and infection.

ALL usually worsens quickly if it is not treated.

## Causes and risk factors for childhood acute lymphoblastic leukemia

Childhood ALL is caused by changes to how the blood stem cells function, especially how they grow and divide into new cells. The exact cause of these cell changes is often unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop ALL. And it will develop in some children who don't have a known risk factor. Risk factors may be genetic or due to other causes.

Possible genetic risk factors for ALL include:

- Down syndrome
- neurofibromatosis type 1
- Bloom syndrome
- Fanconi anemia
- ataxia-telangiectasia
- Li-Fraumeni syndrome (TP53 gene)
- constitutional mismatch repair deficiency (mutations in certain genes that stop DNA from repairing itself, which leads to the growth of cancers at an early age)
- having certain changes in chromosomes or genes

Other possible risk factors for ALL include:

- being exposed to x-rays before birth
- being exposed to radiation
- past treatment with chemotherapy

Talk with your child's doctor if you think your child may be at risk.

## Genetic counseling for children with acute lymphoblastic leukemia

It is not always clear from the family medical history whether a child with ALL has an inherited condition that increased their risk. Genetic counseling can assess the likelihood that your child's cancer is inherited and whether genetic testing is needed. Genetic counselors and other specially trained health professionals can discuss your child's diagnosis and family medical history to help you understand:

- the options for testing for changes in the TP53 gene or other genes
- the risk of other cancers for your child
- the risk of ALL and other cancers for your child's siblings
- the risks and benefits of learning genetic information

Genetic counselors can also help you cope with your child's genetic test results, including how to discuss the results with family members. They can advise you about whether other members of your family should receive genetic testing.

Learn more about Genetic Testing for Inherited Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet).

## Symptoms of childhood acute lymphoblastic leukemia

Symptoms of childhood ALL are caused by not having enough red blood cells and platelets and by having too many white blood cells that don't work well. It's important to check with your child's doctor if your child has:

- fever
- easy bruising or bleeding
- flat, pinpoint, dark-red spots under the skin caused by bleeding (petechiae)
- weakness or fatigue
- pale skin or looks pale
- bone or joint pain
- shortness of breath or trouble breathing
- painless lumps (swollen lymph nodes) in the neck, underarm, stomach, or groin
- pain or a feeling of fullness below the ribs
- loss of appetite
- weight loss
- abdominal pain
- frequent infections or infections that do not go away

These symptoms may be caused by problems other than ALL. The only way to know is for your child to see a doctor.

## Tests to diagnose childhood acute lymphoblastic leukemia

If your child has symptoms that suggest ALL, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend other diagnostic tests. If your child is diagnosed with ALL, the results of these tests will help plan treatment.

The tests used to diagnose childhood acute lymphoblastic leukemia may include:

### Complete blood count (CBC)

A CBC checks a sample of blood for:

- the number of red blood cells and platelets
- the number and type of white blood cells
- the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
- the amount of hematocrit (whole blood that is made up of red blood cells)

Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.

Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.

### Blood chemistry study

Blood chemistry study uses a blood sample to measure the amounts of certain substances released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.

### Bone marrow aspiration and biopsy

The removal of bone marrow and a small piece of bone by inserting a hollow needle into the hipbone or breastbone. A pathologist views the bone marrow and bone under a microscope to look for cancer.

Bone marrow aspiration and biopsy. After a small area of skin is numbed, a bone marrow needle is inserted into the child’s hip bone. Samples of blood, bone, and bone marrow are removed for examination under a microscope.

Bone marrow aspiration and biopsy; drawing shows a child lying face down on a table and a bone marrow needle being inserted into the right hip bone. An inset shows the bone marrow needle being inserted through the skin into the bone marrow of the hip bone.

Tests done on blood or the bone marrow tissue that is removed include:

- Genetic tests: Many leukemia cells have abnormalities in their genes which can be found by different types of genetic tests. An example of a genetic test that is commonly used is cytogenetic analysis, in which the chromosomes in a sample of blood or bone marrow are counted and checked for any changes, such as broken, missing, rearranged, or extra chromosomes. Genetic testing of blood and bone marrow samples is used to help diagnose cancer, plan treatment, or find out how well treatment is working.
- Immunophenotyping: A laboratory test that uses antibodies to identify cancer cells based on the types of antigens or markers on the surface of the cells. This test is used to help diagnose specific types of leukemia. For example, the cancer cells are checked to see if they are B lymphocytes or T lymphocytes.

### Lumbar puncture

Lumbar puncture is a procedure used to collect a sample of cerebrospinal fluid (CSF) from the spinal column (also called spine) to check for leukemia cells. This is done by placing a needle between two bones in the spine and into the lining around the spinal cord to remove a sample of CSF. The sample of CSF is checked under a microscope for signs that leukemia cells have spread to the brain and spinal cord. This procedure is also called an LP or spinal tap.

Lumbar puncture. A patient lies in a curled position on a table. After a small area on the lower back is numbed, a spinal needle (a long, thin needle) is inserted into the lower part of the spinal column to remove cerebrospinal fluid (CSF, shown in blue). The fluid may be sent to a laboratory for testing.

Lumbar puncture; drawing shows a patient lying in a curled position on a table and a spinal needle (a long, thin needle) being inserted into the lower back. Inset shows a close-up of the spinal needle inserted into the cerebrospinal fluid (CSF) in the lower part of the spinal column.

This procedure is done after leukemia is diagnosed to find out if leukemia cells have spread to the brain and spinal cord. Intrathecal chemotherapy is given after the sample of fluid is removed to treat any leukemia cells that may have spread to the brain and spinal cord.

### Chest x-ray

Chest x-ray is a type of radiation that can go through the body and make pictures of the organs and bones inside the chest. The chest x-ray is done to see if leukemia cells have formed a lump in the middle of the chest.

## Getting a second opinion

You may want to get a second opinion to confirm your child's cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the genetic test results, pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's tumor.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/services). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you may want to ask at your child's appointments, visit Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Risk groups for childhood acute lymphoblastic leukemia

In childhood ALL, risk groups are used to plan treatment. The three risk groups in childhood ALL include:

- Standard risk: Children aged 1 to younger than 10 years who have a white blood cell count less than 50,000 per microliter of blood at the time of diagnosis.
- High risk: Children 10 years and older and/or children who have a white blood cell count of 50,000 per microliter of blood or more at the time of diagnosis.
- Very high risk: Children younger than age 1, children with certain changes in the genes, children who have a slow improvement from initial treatment, and children who have signs of leukemia after the first 4 weeks of treatment.

Other factors that affect the risk group include:

- whether the leukemia cells began from B lymphocytes or T lymphocytes
- whether there are certain changes in the chromosomes or genes of the lymphocytes
- whether the leukemia cell count drops quickly and how low it drops after initial treatment
- whether leukemia cells are found in the cerebrospinal fluid or the testes at the time of diagnosis
- having Down syndrome
- receiving steroids before cancer treatment

It is important to know the risk group in order to plan treatment. Children with high-risk or very high-risk ALL usually receive more anticancer drugs and/or higher doses of anticancer drugs than children with standard-risk ALL.

## Types of treatment for childhood acute lymphoblastic leukemia

### Who treats children with acute lymphoblastic leukemia?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of ALL. The pediatric oncologist works with other pediatric health care providers who are experts in treating children with leukemia and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- hematologist
- medical oncologist
- pediatric surgeon
- radiation oncologist
- pediatric intensivist
- neurologist
- neuroradiologist
- pediatric nurse specialist
- social worker
- rehabilitation specialist
- psychologist
- child-life specialist
- fertility specialist

### Treatment phases of childhood acute lymphoblastic leukemia

The treatment of childhood ALL is done in three phases:

- Remission induction is the first phase of treatment. The goal is to kill the leukemia cells in the blood and bone marrow. This puts the leukemia into remission.
- Consolidation/intensification is the second phase of treatment. It begins once the leukemia is in remission. The goal of consolidation/intensification therapy is to kill any leukemia cells that remain in the body and may cause a relapse.
- Maintenance is the third phase of treatment. The goal is to kill any remaining leukemia cells that may regrow and cause a relapse. Often the cancer treatments are given in lower doses than those used during the remission induction and consolidation/intensification phases. This is also called the continuation therapy phase.

Taking medicine as ordered by the doctor during maintenance therapy decreases the chance the cancer will come back.

Treatment options depend on:

- whether the leukemia cells began from B lymphocytes or T lymphocytes
- if your child has standard-risk, high-risk, or very high-risk ALL
- your child's age at the time of diagnosis
- whether there are certain changes in the chromosomes of lymphocytes, such as the Philadelphia chromosome
- whether your child was treated with dexamethasone or prednisone before the start of remission induction therapy
- how quickly and how low the leukemia cell count drops during treatment
- if leukemia was found in the central nervous system

Types of treatment your child might have include:

### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment.

For ALL, chemotherapy may be given a few ways. Chemotherapy that is taken by mouth or injected into a vein enters the bloodstream and reaches cancer cells throughout the body. Chemotherapy that is placed directly into the cerebrospinal fluid (intrathecal chemotherapy) mainly affects cancer cells in this area.

The way the chemotherapy is given depends on your child's risk group. Children with high-risk ALL receive more anticancer drugs and higher doses of anticancer drugs than children with standard-risk ALL. Intrathecal chemotherapy is used to treat childhood ALL that has spread, or may spread, to the brain and spinal cord.

Chemotherapy drugs used alone or in combination to treat ALL in children include:

- asparaginase (https://www.cancer.gov/about-cancer/treatment/drugs/asparaginase-erwinia-chrysanthemi)
- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine)
- daunorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/daunorubicinhydrochloride)
- dexamethasone (https://www.cancer.gov/about-cancer/treatment/drugs/dexamethasone) (steroid)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- mercaptopurine (https://www.cancer.gov/about-cancer/treatment/drugs/mercaptopurine)
- methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
- nelarabine (https://www.cancer.gov/about-cancer/treatment/drugs/nelarabine)
- prednisone (https://www.cancer.gov/about-cancer/treatment/drugs/prednisone) (steroid)
- thioguanine (https://www.cancer.gov/about-cancer/treatment/drugs/thioguanine)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Other drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Childhood ALL is treated with external beam radiation therapy. This type of therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Radiation therapy may be given alone or with other treatments.

External radiation therapy may be used to treat childhood ALL that has spread, or may spread, to the brain, spinal cord, or testicles. It may also be used to prepare the bone marrow for a stem cell transplant.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

### Stem cell transplant

High doses of chemotherapy are given to kill cancer cells. Total-body irradiation is usually given with chemotherapy, but it is sometimes not given to infants and very young children. These treatments destroy healthy cells, including blood-forming cells. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of a donor and are frozen and stored. After the patient completes chemotherapy and radiation therapy, the stored stem cells are thawed and given to the patient through an infusion. These stem cells grow into (and restore) the body's blood cells. The donor stem cells may also find and kill any cancer cells left in the body.

Stem cell transplant is rarely used as initial treatment for children and adolescents with ALL. It is used more often as part of treatment for ALL that relapses (comes back after treatment).

Stem cell transplant. (Step 1): Blood is taken from a vein in the arm of the donor. The blood flows through a machine that removes the stem cells. Then the blood is returned to the donor through a vein in the other arm. (Step 2): The patient receives chemotherapy to kill blood-forming cells. The patient may receive radiation therapy (not shown). (Step 3): The patient receives stem cells through a catheter placed into a blood vessel in the chest.

Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.

### Immunotherapy

Immunotherapy is a treatment that uses the patient's immune system to fight cancer. Substances made by the body or made in a laboratory are used to boost, direct, or restore the body's natural defenses against cancer. Examples of immunotherapy used to treat childhood ALL include blinatumomab, rituximab, and CAR T-cell therapy.

- Blinatumomab (https://www.cancer.gov/about-cancer/treatment/drugs/blinatumomab): Blinatumomab works by bringing healthy T cells (immune cells that help kill cancer cells) and leukemia cells close together so the T cells can more effectively kill the leukemia. It does this by binding to a protein called CD3 on healthy T cells and a protein called CD19 on B cells (the immune cells that are cancerous in acute lymphoblastic leukemia). Blinatumomab is a type of targeted therapy drug called a bispecific T-cell engager (BiTE).
- CAR T-cell therapy: This treatment changes the patient's T-cells (a type of immune system cell) so they will attack certain proteins on the surface of cancer cells. T cells are taken from the patient and special receptors are added to their surface in the laboratory. The changed cells are called chimeric antigen receptor (CAR) T cells. The CAR T cells are grown in the laboratory and given to the patient by infusion. The CAR T cells multiply in the patient's blood and attack cancer cells. CAR T-cell therapy is being studied in the treatment of childhood ALL that has relapsed (come back) a second time.
  CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
  CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
- Rituximab (https://www.cancer.gov/about-cancer/treatment/drugs/rituximab).

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells. Often, targeted therapies are only used in specific ALL subtypes in which the specific target of the drug is present. Targeted therapy used or studied to treat childhood ALL includes:

- bortezomib (https://www.cancer.gov/about-cancer/treatment/drugs/bortezomib)
- dasatinib (https://www.cancer.gov/about-cancer/treatment/drugs/dasatinib)
- imatinib mesylate (https://www.cancer.gov/about-cancer/treatment/drugs/imatinibmesylate)
- inotuzumab ozogamicin (https://www.cancer.gov/about-cancer/treatment/drugs/inotuzumabozogamicin)
- nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
- ruxolitinib (https://www.cancer.gov/about-cancer/treatment/drugs/ruxolitinibphosphate)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

## Treatment options for childhood acute lymphoblastic leukemia

There are different types of treatment for children and adolescents with acute lymphoblastic leukemia (ALL). You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's age and overall health, and whether the tumor is newly diagnosed or has come back.

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Treatment of standard-risk childhood acute lymphoblastic leukemia

Treatment of newly diagnosed standard-risk childhood acute lymphoblastic leukemia (ALL) during the remission induction, consolidation/intensification, and maintenance phases always includes combination chemotherapy. Intrathecal chemotherapy is given to prevent the spread of leukemia cells to the brain and spinal cord.

For children with a poor response to treatment who are in remission after remission induction therapy, a stem cell transplant using stem cells from a donor may be done.

For children with a poor response to treatment who are not in remission after remission induction therapy, further treatment is usually the same treatment given to children with high-risk ALL.

Throughout treatment, it's important that your child take all medicines ordered by the doctor. Not taking the medicines as directed increases the chance the cancer will come back.

### Treatment of high-risk childhood acute lymphoblastic leukemia

The treatment of newly diagnosed high-risk childhood acute lymphoblastic leukemia (ALL) during the remission induction, consolidation/intensification, and maintenance phases always includes combination chemotherapy. Children in the high-risk ALL group are given more anticancer drugs and higher doses of anticancer drugs, especially during the consolidation/intensification phase, than children in the standard-risk group.

Intrathecal and systemic chemotherapy are given to prevent or treat the spread of leukemia cells to the brain and spinal cord. Sometimes radiation therapy to the brain is also given.

Throughout treatment, it's important that your child take all medicines ordered by the doctor. Not taking the medicines as directed increases the chance the cancer will come back.

### Treatment of very high-risk childhood acute lymphoblastic leukemia

Treatment of newly diagnosed very high-risk childhood acute lymphoblastic leukemia (ALL) during the remission induction, consolidation/intensification, and maintenance phases always includes combination chemotherapy. Children in the very high-risk ALL group are given more anticancer drugs than children in the high-risk group. It is not clear whether a stem cell transplant during first remission will help the child live longer.

Intrathecal and systemic chemotherapy are given to prevent or treat the spread of leukemia cells to the brain and spinal cord. Sometimes radiation therapy to the brain is also given.

Throughout treatment, it's important that your child take all medicines ordered by the doctor. Not taking the medicines as directed increases the chance the cancer will come back.

### Treatment of childhood acute lymphoblastic leukemia in the brain and spinal cord or testicles

Chemotherapy to kill leukemia cells or prevent them from spreading to the brain and spinal cord (central nervous system; CNS) is called CNS-directed therapy. Standard doses of chemotherapy may not cross the blood-brain barrier to get into the fluid that surrounds the brain and spinal cord. Therefore, leukemia cells are able to hide in the CNS. Systemic chemotherapy given in high doses or intrathecal chemotherapy (into the cerebrospinal fluid) is able to reach leukemia cells in the CNS. Sometimes external radiation therapy to the brain is also given.

Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.

Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.

These treatments are given in addition to treatment that is used to kill leukemia cells in the rest of the body. All children with ALL receive CNS-directed therapy as part of induction therapy and consolidation/intensification therapy and sometimes during maintenance therapy.

If the leukemia cells spread to the testicles, treatment includes high doses of systemic chemotherapy and sometimes radiation therapy.

Throughout treatment, it's important that your child take all medicines ordered by the doctor. Not taking the medicines as directed increases the chance the cancer will come back.

### Treatment of T-cell childhood acute lymphoblastic leukemia

Treatment of newly diagnosed T-cell childhood acute lymphoblastic leukemia (T-ALL) during the remission induction, consolidation/intensification, and maintenance phases always includes combination chemotherapy. Children with T-ALL are given more anticancer drugs and higher doses of anticancer drugs than children in the newly diagnosed standard-risk group.

Intrathecal and systemic chemotherapy are given to prevent or treat the spread of leukemia cells to the brain and spinal cord. Sometimes radiation therapy to the brain is also given.

Throughout treatment, it's important that your child take all medicine ordered by the doctor. Not taking the medicines as directed increases the chance the cancer will come back.

### Treatment of infants with acute lymphoblastic leukemia

Acute lymphoblastic leukemia (ALL) diagnosed in infancy is uncommon. Infants with ALL usually have more symptoms and need more medical support when they are diagnosed. They have a higher risk of relapse than older children.

Treatment of infants with newly diagnosed ALL during the remission induction, consolidation/intensification, and maintenance phases always includes combination chemotherapy. Infants with ALL are given different anticancer drugs and higher doses of anticancer drugs than children 1 year and older in the standard-risk group. It is not clear whether a stem cell transplant during first remission will help your child live longer.

Intrathecal and systemic chemotherapy are given to prevent or treat the spread of leukemia cells to the brain and spinal cord.

Throughout treatment, it's important that you give your child all medicines ordered by the doctor. Not giving the medicines as directed increases the chance the cancer will come back.

### Treatment of adolescents and young adults with acute lymphoblastic leukemia

Adolescents and young adults are usually considered to have high-risk acute lymphoblastic leukemia (ALL).

Treatment of newly diagnosed ALL in adolescents and young adults during the remission induction, consolidation/intensification, and maintenance phases always includes combination chemotherapy. Adolescents and young adults with ALL are given more anticancer drugs and higher doses of anticancer drugs than children in the standard-risk group.

Intrathecal and systemic chemotherapy are given to prevent or treat the spread of leukemia cells to the brain and spinal cord. Sometimes radiation therapy to the brain is also given.

Throughout treatment, it's important that your child take all medicines ordered by the doctor. Not taking the medicines as directed increases the chance the cancer will come back.

### Treatment of children with Down syndrome and acute lymphoblastic leukemia

Treatment of newly diagnosed acute lymphoblastic leukemia (ALL) in children, adolescents, and young adults with Down syndrome during the remission induction, consolidation/intensification, and maintenance phases always includes combination chemotherapy. Children with Down syndrome and ALL are treated based on their risk group. Children with Down syndrome and ALL may experience more side effects from treatment than other children. Sometimes children with Down syndrome may receive lower doses of anticancer drugs to lower the risk of side effects from treatment.

Intrathecal and systemic chemotherapy are given to prevent or treat the spread of leukemia cells to the brain and spinal cord. Sometimes radiation therapy to the brain is also given.

Throughout treatment, it's important that your child take all medicines ordered by the doctor. Not taking the medicines as directed increases the chance the cancer will come back.

### Treatment of childhood Philadelphia chromosome–positive acute lymphoblastic leukemia

Philadelphia chromosome–positive acute lymphoblastic leukemia (ALL) is uncommon in young children. It occurs more often in adolescence and with increasing age.

Treatment of newly diagnosed Philadelphia chromosome–positive childhood ALL during the remission induction, consolidation/intensification, and maintenance phases always includes combination chemotherapy. Treatment also includes targeted therapy (imatinib mesylate or dasatinib) with or without a stem cell transplant using stem cells from a donor.

Intrathecal and systemic chemotherapy are given to prevent or treat the spread of leukemia cells to the brain and spinal cord.

Throughout treatment, it's important that your child take all medicines ordered by the doctor. Not taking the medicines as directed increases the chance the cancer will come back.

### Treatment of relapsed or refractory childhood acute lymphoblastic leukemia

Refractory childhood acute lymphoblastic leukemia (ALL) is cancer that does not respond to initial treatment.

Relapsed childhood ALL is cancer that has come back after it has been treated. The leukemia may come back in the blood and bone marrow, brain, spinal cord, testicles, or other parts of the body.

Treatment of relapsed childhood acute lymphoblastic leukemia (ALL) that comes back in the bone marrow may include:

- combination chemotherapy with or without immunotherapy (blinatumomab) and/or targeted therapy
- stem cell transplant, using stem cells from a donor

Other treatments for refractory or relapsed childhood ALL may include:

- targeted therapy (inotuzumab, imatinib, or dasatinib)
- chimeric antigen receptor (CAR) T-cell therapy

Treatment of relapsed childhood ALL that comes back outside the bone marrow may include:

- systemic chemotherapy and intrathecal chemotherapy with radiation therapy to the brain and/or spinal cord for cancer that comes back in the brain and spinal cord only
- stem cell transplant for cancer that has relapsed in the brain and/or spinal cord, especially if relapse occurs soon after initial diagnosis
- combination chemotherapy and radiation therapy for cancer that comes back in the testicles only

## Prognostic factors for childhood acute lymphoblastic leukemia

If your child has been diagnosed with ALL, you likely have questions about how serious the cancer is and your child's survival. The likely outcome or course of a disease is called prognosis.

The prognosis depends on:

- how quickly and how low the leukemia cell count drops after the first month of treatment
- your child's age at the time of diagnosis, sex, race, and ethnic background
- the number of white blood cells in the blood at the time of diagnosis
- whether the leukemia cells began from B lymphocytes or T lymphocytes
- whether there are certain changes in the chromosomes or genes of the leukemia cells
- whether your child has Down syndrome
- whether leukemia cells are found in the cerebrospinal fluid at diagnosis
- your child's weight at the time of diagnosis and during treatment

For leukemia that comes back after treatment, your child's prognosis depends partly on:

- how long it is between the time of diagnosis and when the leukemia comes back
- whether the leukemia comes back in the bone marrow or in other parts of the body
- your child's age at relapse
- your child's risk group at initial diagnosis
- your child's initial response to treatment for the relapsed leukemia
- whether the leukemia cells began from B lymphocytes or T lymphocytes
- whether there are certain changes in the chromosomes or genes in the leukemia cells

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

## Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects.

Late effects of cancer treatment may include:

- Physical problems, including problems with the heart, blood vessels, liver, or bones, and fertility.
- Changes in mood, feelings, thinking, learning, or memory. Children younger than 4 years who have received radiation therapy to the brain have a higher risk of these effects.
- Second cancers (new types of cancer) or other conditions, such as brain tumors, thyroid cancer, acute myeloid leukemia, and myelodysplastic syndrome.

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the possible late effects caused by some treatments. Learn more about Late Effects of Treatment for Childhood Cancer.

## Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

Bone marrow aspiration and biopsy are done during initial phases of treatment to see how well the treatment is working. Bone marrow aspiration and biopsy are typically not done after treatment has ended, unless there is concern that the leukemia might have come back.

Learn more about the follow-up tests in Tests to diagnose childhood acute lymphoblastic leukemia.

## Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related resources

For more childhood cancer information and other general cancer resources, visit:

- Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
- CAR T Cells: Engineering Patients' Immune Cells to Treat Their Cancers (https://www.cancer.gov/about-cancer/treatment/research/car-t-cells)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood acute lymphoblastic leukemia. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Acute Lymphoblastic Leukemia. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/leukemia/patient/child-all-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389385]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).